# Sleep Disorders (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of sleep disorders. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Insomnia symptoms occur in about 33% to 50% of the adult population [1] and are often associated with situational stress, illness, aging, and drug treatment.[2] It is estimated that one-third to one-half of people with cancer experience sleep disturbances.[3,4] Physical illness, pain, hospitalization, drugs and other treatments for cancer, and the psychological impact of a malignant disease may disrupt the sleeping patterns of people with cancer.[5] Adequate sleep may increase the cancer patient's pain tolerance. Poor sleep adversely affects daytime mood and performance. In the general population, persistent insomnia has been associated with a higher risk of developing clinical anxiety or depression.[6] Sleep disturbances and, ultimately, sleep-wake cycle reversals can be early signs of a developing delirium.

Sleep consists of two phases:[7]

1. Rapid eye movement (REM) sleep: REM sleep, also known as dream sleep, is the active or paradoxic phase of sleep in which the brain is active.
2. Non-REM (NREM) sleep: NREM sleep is the quiet or restful phase of sleep. NREM, also referred to as slow-wave sleep, is divided into four stages of progressively deepening sleep based on electroencephalogram findings.

The stages of sleep occur in a repeated pattern or cycle of NREM followed by REM, with each cycle lasting approximately 90 minutes. The sleep cycle is repeated four to six times during a 7- to 8-hour sleep period.[7] The sleep-wake cycle is dictated by an inherent biological clock or circadian rhythm. Disruptions in individual sleep patterns can disrupt the circadian rhythm and impair the sleep cycle.[8]

The Sleep Disorders Classification Committee of the American Academy of Sleep Medicine has identified five major categories of sleep disorders:[9]

1. Disorders of initiating and maintaining sleep (insomnias).
2. Sleep-related breathing disorders (sleep apnea).
3. Disorders of excessive somnolence (hypersomnias).
4. Disorders of the sleep-wake cycle (circadian rhythm sleep disorders).
5. Dysfunctions associated with sleep, sleep stages, or partial arousals (parasomnias).

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Schutte-Rodin S, Broch L, Buysse D, et al.: Clinical guideline for the evaluation and management of chronic insomnia in adults. J Clin Sleep Med 4 (5): 487-504, 2008.18853708
Sateia MJ, Pigeon WR: Identification and management of insomnia. Med Clin North Am 88 (3): 567-96, vii, 2004.15087205
Palesh OG, Roscoe JA, Mustian KM, et al.: Prevalence, demographics, and psychological associations of sleep disruption in patients with cancer: University of Rochester Cancer Center-Community Clinical Oncology Program. J Clin Oncol 28 (2): 292-8, 2010.19933917
Savard J, Morin CM: Insomnia in the context of cancer: a review of a neglected problem. J Clin Oncol 19 (3): 895-908, 2001.11157043 21104141
Berger AM: Update on the state of the science: sleep-wake disturbances in adult patients with cancer. Oncol Nurs Forum 36 (4): E165-77, 2009.19581220
Ohayon MM, Caulet M, Lemoine P: Comorbidity of mental and insomnia disorders in the general population. Compr Psychiatry 39 (4): 185-97, 1998 Jul-Aug.9675502
Hirshkowitz M: Normal human sleep: an overview. Med Clin North Am 88 (3): 551-65, vii, 2004.15087204
Hrushesky WJ, Grutsch J, Wood P, et al.: Circadian clock manipulation for cancer prevention and control and the relief of cancer symptoms. Integr Cancer Ther 8 (4): 387-97, 2009.19926611
American Academy of Sleep Medicine: The International Classification of Sleep Disorders: Diagnostic & Coding Manual. 2nd ed. American Academy of Sleep Medicine, 2005.

## Sleep Disturbances in Cancer Patients

Cancer patients are at great risk of developing insomnia and disorders of the sleep-wake cycle. Insomnia, the most common sleep disturbance in this population, is most often secondary to physical and/or psychological factors related to cancer and/or cancer treatment.[1-6] Anxiety and depression—common psychological responses to the diagnosis of cancer, cancer treatment, and hospitalization—are highly correlated with insomnia.[7,8];[9][Level of evidence: II] In addition, sleep disturbances may be part of cancer-related symptom clusters. For more information, see Symptom Clusters in Cancer.

Sleep disturbances may be exacerbated by paraneoplastic syndromes associated with steroid production and by symptoms associated with tumor invasion, such as:

- Draining lesions.
- Gastrointestinal (GI) and genitourinary (GU) alterations.
- Pain.
- Fever.
- Cough.
- Dyspnea.
- Pruritus.
- Fatigue.

Sleep disturbance can also vary by diagnosis. In a study of patients with melanoma (n = 124), breast cancer (n = 124), and endometrial cancer (n = 82),[10][Level of evidence: II] symptom profiles differed by diagnosis. Four symptom profiles were identified: minimally symptomatic, insomnia-predominant, very sleepy with upper airway symptoms, and symptomatic with severe dysfunction. Using latent class profile analysis, group differences by cancer diagnosis were identified, as shown in Table 1:

Table 1. Sleep-Disturbance Symptom Profiles by Cancer Diagnosis

Cancer Type | Minimally Symptomatic | Insomnia-Predominant | Very Sleepy With Upper Airway Symptoms | Symptomatic With Severe Dysfunction
Melanoma | X | | X
Breast | | X | | X
Endometrial | X | X | X | X

Differences by disease groups may be associated with treatment regimens and/or other factors.

Medications—including vitamins, corticosteroids, neuroleptics for nausea and vomiting, and sympathomimetics for the treatment of dyspnea—and other treatment factors can negatively impact sleep patterns.

Side effects of treatment that may affect the sleep-wake cycle include the following:[11];[9][Level of evidence: II]

- Pain.
- Anxiety.
- Night sweats/hot flashes. For more information, see Hot Flashes and Night Sweats.
- GI disturbances (e.g., incontinence, diarrhea, constipation, or nausea).
- GU disturbances (e.g., incontinence, retention, or GU irritation).
- Respiratory disturbances.
- Fatigue.

Sustained use of the following can cause insomnia:

- Sedatives and hypnotics (e.g., glutethimide, benzodiazepines, pentobarbital, chloral hydrate, secobarbital sodium, and amobarbital sodium).
- Anticonvulsants (e.g., phenytoin).
- Corticosteroids.
- Oral contraceptives.
- Monoamine oxidase inhibitors.
- Methyldopa.
- Propranolol.
- Atenolol.
- Alcohol.
- Thyroid preparations.

In addition, withdrawal from the following substances may cause insomnia:

- Central nervous system depressants (e.g., barbiturates, opioids, glutethimide, chloral hydrate, methaqualone, ethchlorvynol, alcohol, and over-the-counter and prescription antihistamine sedatives).
- Benzodiazepines.
- Major tranquilizers.
- Tricyclic and monamine oxidase inhibitor antidepressants.
- Illicit drugs (e.g., marijuana, cocaine, phencyclidine, and opioids).

Hypnotics can interfere with rapid eye movement (REM) sleep, resulting in increased irritability, apathy, and diminished mental alertness. Abrupt withdrawal of hypnotics and sedatives may lead to symptoms such as:

- Nervousness.
- Jitteriness.
- Seizures.
- REM rebound.

REM rebound is a marked increase in REM sleep, with increased frequency and intensity of dreaming, including nightmares.[12] The increased physiological arousal that occurs during REM rebound may be dangerous for patients with peptic ulcers or a history of cardiovascular problems. Newer medications for insomnia have reduced adverse effects.[13]

The sleep of hospitalized patients is likely to be frequently interrupted by treatment schedules, hospital routines, and roommates, which singularly or collectively alter the sleep-wake cycle. Other factors influencing sleep-wake cycles in the hospital setting include patient age, comfort, pain, anxiety, environmental noise, and temperature.[14]

Consequences of sleep disturbances can influence outcomes of therapeutic and supportive care measures.[15] The patient with mild to moderate sleep disturbances may experience irritability and inability to concentrate, which may in turn affect compliance with treatment protocols, the ability to make decisions, and relationships with significant others. Sleep disturbances can also cause depression and anxiety. Supportive care measures are directed toward promoting quality of life and adequate rest.

### References

Savard J, Morin CM: Insomnia in the context of cancer: a review of a neglected problem. J Clin Oncol 19 (3): 895-908, 2001.11157043 21104141
Savard J, Simard S, Blanchet J, et al.: Prevalence, clinical characteristics, and risk factors for insomnia in the context of breast cancer. Sleep 24 (5): 583-90, 2001.11480655
Savard J, Simard S, Hervouet S, et al.: Insomnia in men treated with radical prostatectomy for prostate cancer. Psychooncology 14 (2): 147-56, 2005.15386779
Otte JL, Carpenter JS, Russell KM, et al.: Prevalence, severity, and correlates of sleep-wake disturbances in long-term breast cancer survivors. J Pain Symptom Manage 39 (3): 535-47, 2010.20083371
Lee ES, Lee MK, Kim SH, et al.: Health-related quality of life in survivors with breast cancer 1 year after diagnosis compared with the general population: a prospective cohort study. Ann Surg 253 (1): 101-8, 2011.21294288
Wong AK, Wang D, Marco D, et al.: Prevalence, Severity, and Predictors of Insomnia in Advanced Colorectal Cancer. J Pain Symptom Manage 66 (3): e335-e342, 2023.37295563
Bardwell WA, Profant J, Casden DR, et al.: The relative importance of specific risk factors for insomnia in women treated for early-stage breast cancer. Psychooncology 17 (1): 9-18, 2008.17428006
Palesh OG, Roscoe JA, Mustian KM, et al.: Prevalence, demographics, and psychological associations of sleep disruption in patients with cancer: University of Rochester Cancer Center-Community Clinical Oncology Program. J Clin Oncol 28 (2): 292-8, 2010.19933917
Van Onselen C, Cooper BA, Lee K, et al.: Identification of distinct subgroups of breast cancer patients based on self-reported changes in sleep disturbance. Support Care Cancer 20 (10): 2611-9, 2012.22290719
Kairaitis K, Madut AS, Subramanian H, et al.: Cancer sleep symptom-related phenotypic clustering differs across three cancer specific patient cohorts. J Sleep Res 31 (5): e13588, 2022.35470503
Vena C, Parker K, Cunningham M, et al.: Sleep-wake disturbances in people with cancer part I: an overview of sleep, sleep regulation, and effects of disease and treatment. Oncol Nurs Forum 31 (4): 735-46, 2004.15252429
Chouinard G: Issues in the clinical use of benzodiazepines: potency, withdrawal, and rebound. J Clin Psychiatry 65 (Suppl 5): 7-12, 2004.15078112
Barbera J, Shapiro C: Benefit-risk assessment of zaleplon in the treatment of insomnia. Drug Saf 28 (4): 301-18, 2005.15783240
Boonstra L, Harden K, Jarvis S, et al.: Sleep disturbance in hospitalized recipients of stem cell transplantation. Clin J Oncol Nurs 15 (3): 271-6, 2011.21624862
Sateia MJ, Doghramji K, Hauri PJ, et al.: Evaluation of chronic insomnia. An American Academy of Sleep Medicine review. Sleep 23 (2): 243-308, 2000.10737342

## Assessment

Assessment is the initial step in managing sleep disturbances in people with cancer. Assessment data should include the following:[1]

- Documentation of predisposing factors.
- Sleep patterns.
- Emotional status.
- Exercise and activity levels.
- Diet.
- Symptoms.
- Medications.
- Caregiver routines.

The sections below outline recommendations for a sleep history and physical examination. Data can be retrieved from multiple sources, such as:[2]

- The patient’s subjective report of sleep difficulty.
- Objective observations of behavioral and physiological manifestations of sleep disturbances.
- Reports from the patient's significant other regarding the patient's quality of sleep.

The Insomnia Severity Index, which has been validated in adult oncology populations, is recommended when screening for insomnia in clinical settings.[3,4] In a 2021 study, the Insomnia Severity Index was validated in young adult (18–40 years of age) cancer survivors.[5]

The diagnosis of insomnia is primarily based on a careful, detailed medical and psychiatric history. The American Academy of Sleep Medicine has produced guidelines for the use of polysomnography as an objective tool in evaluating insomnia. The routine polysomnogram includes the monitoring of the following:

- Electroencephalography.
- Electro-oculography.
- Electromyography.
- Effort of breathing and air flow.
- Oxygen saturation.
- Electrocardiography.
- Body position.

Polysomnography is the major diagnostic tool for assessment of sleep disorders. It is indicated in the evaluation of suspected sleep-related breathing disorders and periodic limb movement disorder, when the cause of insomnia is uncertain, or when behavioral or pharmacological therapy is unsuccessful.[6]

Sleep disturbances have been shown to change throughout the cancer trajectory, which supports the need to assess sleep throughout the patient’s cancer experience. One descriptive study [7][Level of evidence: II] involving 398 women with breast cancer used the General Sleep Disturbance Scale (GSDS) to identify three different sleep trajectories when self-reported sleep was evaluated beginning before surgery and continuing for 6 months. One group (55% of the sample) had a high level of sleep disturbance throughout the study, defined as scores on the GSDS of about 58 to 60 at all data points. A second group (40% of the sample) was considered to have a low level of sleep disturbance throughout, defined as scores on the GSDS in the low 30s at each data point. The final group (5% of the sample) started out high, with scores around 62, but their scores decreased to below 30 over the first 4 months and remained there through month 6. Participants identified as having a more severe sleep disorder were significantly younger, had more comorbidities, had a lower performance status, and experienced hot flashes. In another study, of 232 women with gynecologic cancers that assessed sleep using the GSDS at six time points over two cycles of chemotherapy, four distinct subgroups of patients with sleep disturbance were identified (Low, 18.5%; Moderate, 43.6%; High, 29.3%; Very High, 8.6%).[8][Level of evidence: II] Participants with the worst sleep disturbance were younger, had a higher body mass index, and were more likely to report depression or back pain.

Sleep disturbances frequently co-occur with cancer-related fatigue and may have common underlying mechanisms. Prospective and multidimensional assessments of these two symptoms were conducted in a study involving patients who were newly diagnosed with stage I through stage IIIA breast cancer (N = 152).[9] Assessments included validated sleep and fatigue questionnaires and objective sleep assessments using wrist actigraphy, which measure sleep-wake patterns and circadian rhythms. Assessments were conducted before initiation of chemotherapy (T1) and during the last week of the fourth cycle of anthracycline-based chemotherapy (T2). Most patients in the group characterized by severe symptoms at T1 were also in a higher-symptoms group at T2. Similarly, many patients in that group at T1 remained in the minimal-symptoms group at T2. From T1 to T2, the average-symptoms group was relatively unstable compared with the severe- and minimal-symptoms groups. At both time points, younger patients reported more severe symptoms, and married patients reported less severe symptoms. Patients who reported more comorbidities, more use of medications, and other indicators of worse health (e.g., higher BMI) were more likely to be in the group characterized by higher symptom severity at both time points.

In addition, stress can contribute to sleep disturbance. A study of 957 patients undergoing chemotherapy treatment for breast, lung, gastrointestinal, or gynecological cancer measured responses to validated stress/resilience assessment instruments (14-item Perceived Stress Scale, 22-item Impact of Event Scale-Revised, 30-item Life Stressor Checklist-Revised, and 10-item Connor-Davidson Resilience Scale). Compared with patients classified in a normative or resilient class, patients in the stressed class had significantly higher levels of sleep disturbance. Also, each of the domains of sleep disturbance within the validated 21-item GSDS (quantity, quality, sleep onset latency, mid-sleep awakening, early awakenings, and excessive daytime sleepiness) and use of medications to help with sleep were statistically significant and crossed clinically meaningful cutoff points for patients in the stressed class.[10]

Risk Factors for Sleep Disorders
- Disease factors, including paraneoplastic syndromes with increased steroid production, and symptoms associated with tumor invasion (e.g., obstruction, pain, fever, shortness of breath, pruritus, and fatigue).
- Treatment factors, including symptoms related to surgery (e.g., pain, frequent monitoring, and use of opioids), chemotherapy (e.g., exogenous corticosteroids), and symptoms related to chemotherapy.
- Medications such as opioids; sedatives/hypnotics; steroids; caffeine/nicotine; some antidepressants; and dietary supplements, including some vitamins, diet pills, and other products promoting weight loss and appetite suppression.
- Environmental factors.
- Physical and/or psychological stressors.
- Depression. For more information, see Depression.
- Anxiety. For more information, see the Anxiety Disorders: Description and Etiology section in Adjustment to Cancer: Anxiety and Distress.
- Delirium.
- Daytime seizures, snoring, and headaches.

Characterization of Sleep
- Usual patterns of sleep, including usual bedtime, routine before retiring (e.g., food, bath, and medications), length of time before onset of sleep, and duration of sleep (waking episodes during night, ability to resume sleep, and usual time of awakening).
- Characteristics of disturbed sleep (changes after diagnosis, treatment, and/or hospitalization).
- The significant other's perception of the patient's quantity and quality of sleep.
- Family history of sleep disorders.

### References

American Academy of Sleep Medicine: The International Classification of Sleep Disorders: Diagnostic & Coding Manual. 2nd ed. American Academy of Sleep Medicine, 2005.
Perlis ML, Jungquist C, Smith MT, et al.: Cognitive Behavioral Treatment of Insomnia: A Session-by-Session Guide. Springer Science+Business Media LLC, 2008.
Bastien CH, Vallières A, Morin CM: Validation of the Insomnia Severity Index as an outcome measure for insomnia research. Sleep Med 2 (4): 297-307, 2001.11438246
Savard MH, Savard J, Simard S, et al.: Empirical validation of the Insomnia Severity Index in cancer patients. Psychooncology 14 (6): 429-41, 2005.15376284
Michaud AL, Zhou ES, Chang G, et al.: Validation of the Insomnia Severity Index (ISI) for identifying insomnia in young adult cancer survivors: comparison with a structured clinical diagnostic interview of the DSM-5 (SCID-5). Sleep Med 81: 80-85, 2021.33640841
Kushida CA, Littner MR, Morgenthaler T, et al.: Practice parameters for the indications for polysomnography and related procedures: an update for 2005. Sleep 28 (4): 499-521, 2005.16171294
Van Onselen C, Cooper BA, Lee K, et al.: Identification of distinct subgroups of breast cancer patients based on self-reported changes in sleep disturbance. Support Care Cancer 20 (10): 2611-9, 2012.22290719
Pozzar RA, Hammer MJ, Paul SM, et al.: Distinct sleep disturbance profiles among patients with gynecologic cancer receiving chemotherapy. Gynecol Oncol 163 (2): 419-426, 2021.34521555
Fox RS, Ancoli-Israel S, Roesch SC, et al.: Sleep disturbance and cancer-related fatigue symptom cluster in breast cancer patients undergoing chemotherapy. Support Care Cancer 28 (2): 845-855, 2020.31161437
Jakovljevic K, Kober KM, Block A, et al.: Higher Levels of Stress Are Associated With a Significant Symptom Burden in Oncology Outpatients Receiving Chemotherapy. J Pain Symptom Manage 61 (1): 24-31.e4, 2021.32721501

## Management

Management of sleep disturbances should focus on treatment of problems such as:

- Falling asleep.
- Staying asleep.
- Early-morning awakenings.

Other areas to manage include symptoms from cancer and its treatment and the identification and management of environmental and psychological factors. When sleep disturbances are caused by symptoms of cancer or its treatment, measures that control or alleviate symptoms are often the key to resolving sleep disturbances. Management of sleep disturbances combines nonpharmacological and pharmacological approaches individualized for the patient.

### Nonpharmacological Management of Sleep Disturbances

Many people who experience insomnia have poor sleep hygiene (such as smoking and drinking excessive alcohol just before bedtime), which can exacerbate or perpetuate insomnia.[1][Level of evidence: III] A complete assessment of sleep hygiene (i.e., time in bed; napping during the day; intake of caffeine, alcohol, or foods that are heavy, spicy, or sugary; exercise; and sleep environment) and use of behavioral management strategies (i.e., fixed bedtime; restrictions on smoking, diet, and excessive alcohol 4–6 hours before bedtime; and increased exercise) may prove effective in reducing sleep disturbances.

Sleep hygiene in an inpatient setting involves modifying the sleep environment to decrease sleep disruption. Minimizing noise, dimming or turning off lights, adjusting room temperature, and consolidating patient care tasks to reduce the number of interruptions can increase the amount of uninterrupted sleep.[2][Level of evidence: IV]

Cognitive strategies include:[3]

- Restructuring negative thoughts, beliefs, and attitudes related to sleep.
- Preventing excessive monitoring or worrying about getting enough sleep.

Behavioral strategies include:

- Stimulus control.
- Sleep restriction.

Both of these strategies seek to limit the time spent in bed that does not involve sleeping.[3-5] Several large randomized trials and meta-analyses provide the evidence base for the efficacy of cognitive behavioral therapy (CBT) for insomnia (CBT-I).[3,6,7] Most of these trials have been in populations of patients without cancer.

Components of CBT-I include the following:

- Cognitive restructuring.
- Behavioral strategies.
- Relaxation training.[4]
- Basic sleep hygiene education.

Relaxation therapy can be used to achieve both behavioral and cognitive outcomes, particularly when it is combined with imagery. Educational objectives around sleep hygiene are also used to treat insomnia and include content on the following:[4]

- Sleeping and waking up at regular times.
- Relaxing before bedtime.
- Creating a dark, comfortable sleep environment.
- Avoiding watching television or working in the bedroom.
- Getting ample daylight during nonsleep hours.
- Avoiding naps.
- Limiting caffeine.
- Getting regular exercise but no closer than 3 hours before bedtime.

Practice guidelines from the American Academy of Sleep Medicine clearly state that multicomponent therapy is recommended over single therapies. Because of insufficient evidence about its efficacy, sleep hygiene education is not recommended as a single-modality management approach; other reviews state that sleep hygiene by itself is not effective.[6,8] Information about sleep hygiene should be included in patient education about sleep issues.

Several trials and meta-analyses have shown CBT-I to be at least as effective as conventional pharmacological therapies in treating primary chronic insomnia but without side effects.[6,7,9-11]

A four-arm study (conducted in patients with primary chronic insomnia) that evaluated zolpidem versus CBT versus zolpidem and CBT versus placebo reported a greater effect (P = .05) on sleep-onset latency for both groups involving CBT (change of 44%) versus the group receiving zolpidem alone (change of 29%).[12] Another study, also conducted in patients with primary chronic insomnia, evaluated CBT with temazepam alone versus a combination of CBT and temazepam versus placebo and found that all active treatments were significantly better than placebo and that there was a trend for the most improvement in the combined arm of CBT and temazepam.[13] Both arms with CBT demonstrated greater reductions in time to sleep onset than the pharmacotherapy-alone arm (64% in the combined arm, 55% in the CBT arm, and 47% in the temazepam arm). A meta-analysis examining pharmacological and behavioral studies for persistent insomnia found that pharmacological and behavioral treatments did not differ in magnitude of benefit except for latency to sleep onset, in which greater reductions were found with behavioral therapy.[7]

There are limited data evaluating elements of CBT-I in cancer survivors, and most data are about women with breast cancer. However, there have been at least four randomized controlled trials of CBT-I in cancer survivors.[14-17] The intervention was typically delivered over five to eight weekly, small-group, in-person sessions. One trial included patients with cancer diagnoses other than breast cancer,[16] and results did not differ by cancer diagnosis. All studies showed improvements in numerous sleep parameters over time in the groups receiving CBT-I and demonstrated continued benefits 6 and 12 months later. Two of the four trials did not use active control arms.[14,16]

Most studies using active control arms were in breast cancer survivors. One study compared CBT-I with sleep education and hygiene in 72 women,[15] while the other study used a healthy-eating education control group.[17] In the first study, both groups significantly improved over time, with some significant differences between groups favoring CBT-I for time to fall asleep, time awake after sleep, total sleep time, and overall sleep quality. For example, the group receiving CBT-I improved by 30 minutes in time to fall asleep, compared with 11 minutes in the sleep education and hygiene group.[15]

In the second study, 219 women were randomly assigned to a behavioral therapy group consisting of stimulus control, general sleep hygiene (limiting naps, going to bed and rising at consistent times), and relaxation or to a healthy-eating education control group. The interventions were delivered by trained nurses in person, 2 days before the initiation of chemotherapy, before each chemotherapy treatment, and 30 days after the last chemotherapy treatment. The nurses worked with women assigned to behavioral therapy to individualize and reinforce the behaviors. The Pittsburgh Sleep Quality Index (PSQI) was used to measure subjective sleep quality, complemented by use of a sleep diary and wrist actigraph. Sleep quality significantly improved in the group receiving behavioral therapy, compared with the control group. These differences were also seen in data from the sleep diary and actigraph, with both showing significantly fewer awakenings in the behavioral therapy group.[18] Sleep quality was significantly better at 90 days and at 1 year in the behavioral therapy group, as measured by the PSQI but not the diary or actigraph.[17]

In some places, patients may not have access to in-person, professionally delivered CBT-I. A randomized controlled trial conducted with breast cancer survivors demonstrated that CBT-I delivered via digital media can also produce meaningful clinical improvements, although improvements are not as robust as those produced with professionally delivered CBT-I. This three-armed trial compared video-based CBT-I (VCBT-I) and professionally delivered CBT-I (PCBT-I) with a no-treatment control group in 242 breast cancer survivors. Both the VCBT-I and PCBT-I groups had significantly greater improvements in diary-measured sleep variables, compared with the control group. The patients in the PCBT-I group reported greater improvements in some sleep outcomes and in fatigue and depression levels than did the VCBT-I group.[19]

Table 2. Evidence for Cognitive Behavioral Therapy for Insomnia (CBT-I) in Cancer Survivors

Reference | Cancer Type | Sample Size and Design | Control and CBT-I Intervention | Measures | Outcomes
Berger et al., 2009 [17] | Breast (stages I–III) during chemotherapy | N = 219; RCT | Control: Healthy-eating group (sessions with equal time, attention) | PSQI, sleep diary, actigraphy^a^, fatigue assessment | Significant improvement in sleep quality and nighttime awakenings for CBT group, compared with control group
Berger et al., 2009 [17] | Breast (stages I–III) during chemotherapy | N = 219; RCT | CBT-I: Individualized plan before chemotherapy, stimulus control, modified sleep restriction, relaxation therapy, sleep hygiene | PSQI, sleep diary, actigraphy^a^, fatigue assessment | Significant improvement in sleep quality and nighttime awakenings for CBT group, compared with control group
Epstein et al., 2007 [15] | Breast (stages I–III) | N = 72; RCT | Control: Sleep education and hygiene | Sleep diary, actigraphy, ISI | Both groups improved over time; significant improvement between groups favored CBT-I group in time to fall asleep, time awake after sleep onset, total sleep time, sleep quality (as measured by ISI)
Epstein et al., 2007 [15] | Breast (stages I–III) | N = 72; RCT | CBT-I: 6 sessions, stimulus control, sleep restriction, sleep education and hygiene | Sleep diary, actigraphy, ISI | Both groups improved over time; significant improvement between groups favored CBT-I group in time to fall asleep, time awake after sleep onset, total sleep time, sleep quality (as measured by ISI)
Espie et al., 2008 [16] | Mixed | N = 150; RCT | Control: Sleep education and hygiene | Sleep diary; actigraphy; fatigue, depression/anxiety, and QOL assessments | Significant improvement in time to fall asleep, time awake after sleep onset, sleep efficiency, fatigue, specific QOL outcomes for CBT-I group, compared with control group
Espie et al., 2008 [16] | Mixed | N = 150; RCT | CBT-I: 5 weekly sessions, stimulus control, sleep restriction, cognitive restructuring | Sleep diary; actigraphy; fatigue, depression/anxiety, and QOL assessments | Significant improvement in time to fall asleep, time awake after sleep onset, sleep efficiency, fatigue, specific QOL outcomes for CBT-I group, compared with control group
Savard et al., 2005 [14] | Breast (stages I–III) | N = 57; RCT | Control: Wait list | Sleep diary; polysomnography^b^; ISI; fatigue, depression/anxiety, and QOL assessments | Significant improvement in time to fall asleep, time awake after sleep onset, sleep efficiency, depression/anxiety, and QOL outcomes for CBT group, compared with control group
Savard et al., 2005 [14] | Breast (stages I–III) | N = 57; RCT | CBT-I: 8 weekly sessions, stimulus control, sleep restriction, sleep education and hygiene, cognitive restructuring, fatigue management | Sleep diary; polysomnography^b^; ISI; fatigue, depression/anxiety, and QOL assessments | Significant improvement in time to fall asleep, time awake after sleep onset, sleep efficiency, depression/anxiety, and QOL outcomes for CBT group, compared with control group
Savard et al., 2014 [19] | Breast (stages I–III) | N = 242; RCT | Control: No treatment (n = 81) | Sleep diary; ISI; actigraphy; fatigue, depression/anxiety, and QOL assessments | Compared with control group, PCBT-I and VCBT-I groups associated with significant improvement in sleep diary–measured sleep variables; compared with VCBT-I group, PCBT-I group had more improvement in sleep, fatigue, and depression/anxiety outcomes and had higher remission rates for insomnia
Savard et al., 2014 [19] | Breast (stages I–III) | N = 242; RCT | PCBT-I (n = 81): 6 weekly sessions | Sleep diary; ISI; actigraphy; fatigue, depression/anxiety, and QOL assessments
Savard et al., 2014 [19] | Breast (stages I–III) | N = 242; RCT | VCBT-I (n = 80): 60-min animated video, 6 booklets | Sleep diary; ISI; actigraphy; fatigue, depression/anxiety, and QOL assessments
Savard et al., 2014 [19] | Breast (stages I–III) | N = 242; RCT | CBT-I content: Similar for both groups (stimulus control, sleep restriction, sleep education and hygiene, cognitive restructuring) | Sleep diary; ISI; actigraphy; fatigue, depression/anxiety, and QOL assessments

ISI = Insomnia Severity Index; PCBT-I = professionally administered CBT-I; PSQI = Pittsburgh Sleep Quality Index; QOL = quality of life; RCT = randomized controlled trial; VCBT-I = video-based CBT-I.

^a^Actigraphy: A technique that uses a small instrument called an actigraph (a watch-like sensory unit) worn on the wrist or ankle to measure body gross motor activity. It is helpful in determining sleep patterns and daytime activity.

^b^Polysomnography: A test used to diagnose sleep disorders on the basis of sleep-related biophysiological changes.

#### Inpatient nonpharmacological management

CBT delivered by psychologists has shown promise for the treatment of insomnia in patients with cancer.[14][Level of evidence: I] A randomized controlled study investigated the effectiveness of a protocol-driven cognitive behavioral intervention for insomnia delivered by oncology nurses.[16][Level of evidence: I] This group intervention consisted of standard CBT components such as stimulus control and sleep restriction. Participants included patients with heterogeneous cancers randomly assigned to receive the intervention (n = 100) or treatment as usual (n = 50). Primary outcomes were sleep diary measures at baseline, posttreatment, and at 6-month follow-up. CBT was associated with significant and sustained improvements in several sleep aspects. These improvements were seen for both subjective (sleep diary) and objective (actigraphy) assessments. Additionally, patients who received CBT showed significant improvements in fatigue, anxiety, and depressive symptoms and reported improved quality of life, compared with patients who received treatment as usual.[16][Level of evidence: I]

A study conducted in cancer survivors demonstrated the benefits of a specialized yoga program to improve sleep quality and reduce medication use. A total of 410 cancer survivors with moderate to severe sleep disturbances were randomly assigned to receive standard care or standard care plus a 4-week yoga intervention delivered in two weekly sessions by trained yoga instructors. The yoga participants showed significant improvement in sleep quality, daytime dysfunction, nighttime awakening, and sleep efficiency, compared with standard-care participants. One major limitation of this study was its limited population generalizability, as most study participants were female, White, married, and well-educated breast cancer survivors. Another major limitation was the lack of an adequate control group with respect to nonspecific effects such as group support and attention.[20]

Exercise interventions have shown positive effects on subjective and objective sleep quality in patients with cancer. A study conducted in Taiwanese patients with lung cancer investigated the effects of a 12-week exercise intervention on sleep quality and rest-activity rhythms.[21] The intervention included a home-based walking exercise regimen (walking at a moderate intensity for 40 minutes, 3 times per week) and weekly exercise counseling. Participants were randomly assigned to either the intervention group (n = 56) or the usual-care group (n = 55). Assessments conducted at baseline, 3 months, and 6 months included a subjective sleep assessment using the PSQI and objective sleep and rest-activity assessment using actigraphy.

Over time, the walking exercise group showed significant improvement in subjective sleep quality (lower PSQI scores) compared with the usual-care group. The walking exercise group also showed improvement in total sleep time (TST), an important objective measure of sleep quality, compared with the usual-care group. Additionally, the positive effects on TST (i.e., increase in TST) were greater in patients with poor rest-activity rhythm at baseline, suggesting more benefits in patients with poor circadian sleep-activity rhythms. The limitations of the study included a lack of blinding, hence a possible placebo effect in the intervention group. Also, despite randomization, the mean amount of baseline moderate physical activity was higher in the usual-care group than in the intervention group.

Other actions or interventions that may promote rest in the hospital or extended-care setting include the following:[22,23]

- Keeping the patient's skin clean and dry.
- Giving back rubs and/or massaging areas of the body to bring comfort to the patient (e.g., bony prominences, head and scalp, shoulders, hands, and feet).
- Keeping bedding and/or surfaces of support devices (chairs and pillows) clean, dry, and wrinkle-free.
- Ensuring adequate bedcovers for warmth.
- Regulating fluid intake to avoid frequent awakening for elimination.
- Encouraging bowel and bladder elimination before sleep.
- Promoting optimal bowel function (increased fluids, dietary fiber, and use of stool softeners and laxatives).
- Using a condom catheter for nocturnal incontinence.
- Providing a high-protein snack 2 hours before bedtime (e.g., milk, turkey, or other foods high in tryptophan).
- Avoiding beverages with caffeine and other stimulants, including dietary supplements that promote metabolism changes and appetite suppression.
- Encouraging the patient to dress in loose, soft clothing.
- Facilitating comfort through repositioning and support with pillows as needed.
- Encouraging activity and being out of bed as much as possible during waking hours.
- Encouraging the patient to keep regular bedtime and waking hours and avoid napping during the day.
- Minimizing and coordinating necessary bedside contacts.

Psychological interventions are directed toward facilitating the patient's coping processes through education, support, and reassurance. As the patient learns to cope with the stresses of illness, hospitalization, and treatment, sleep may improve.[24][Level of evidence: IV] Communication, verbalization of concerns, and openness between the patient, family, and health care team should be encouraged. Relaxation exercises and self-hypnosis performed at bedtime can help promote calm and sleep. Cognitive-behavioral interventions that diminish the distress associated with early insomnia and change the goal from “need to sleep” to “just relax” can diminish anxiety and promote sleep.[25]

### Pharmacological Management of Sleep-Wake Cycle Disturbances

When cancer survivors experience sleep-wake disturbances, cognitive behavioral intervention counseling should be the first consideration for management. For more information, see the Nonpharmacological Management of Sleep Disturbances section. Resources for education and training in CBT may not be readily available in many cancer centers; therefore, community resources need to be investigated. If CBT is not available or has not been successful, pharmacological management can be considered. In addition, when patients have comorbidities contributing to sleep-wake cycle disturbances (such as hot flashes, uncontrolled pain, anxiety, depression, or other mood disturbances),[26,27] then pharmacological management will probably be necessary. While many pharmacological agents are approved for primary insomnia and many others are used off-label to manage sleep and related symptoms, most of the approved sleep aids have not been studied in cancer populations; therefore, the risk/benefit profiles of these drugs are not delineated in this setting.

Despite the lack of evidence in cancer populations, clinicians widely use pharmacological interventions. Therefore, the following discussion of pharmacological agents and recommendations for use is based on evidence from studies conducted in patients with primary insomnia and clinical experience.[4,28,29]

Several classes of medications are used to treat sleep-wake cycle disturbances, including the following:

- Nonbenzodiazepine benzodiazepine receptor agonists (e.g., zolpidem).
- Benzodiazepines (e.g., lorazepam).
- Melatonin receptor agonists (e.g., ramelteon).
- Antihistamines (e.g., hydroxyzine).
- Antidepressants (e.g., trazodone) and antipsychotics (e.g., quetiapine) that have sedative effects.

Drug characteristics to consider before a drug is chosen to treat an individual patient include the following:

- Absorption.
- Time to reach maximum concentration.
- Elimination half-life.
- Receptor activity.
- Ability to cross the blood-brain barrier.
- Dose and frequency.
- Formulation (short-acting versus long-acting).

These pharmacokinetic principles are important to match the agent to the type of sleep disturbance (e.g., problems falling asleep versus problems staying asleep). There are also safety issues to be considered, such as potentials for tolerance, abuse, dependence, withdrawal (including risk of rebound insomnia), and drug-drug and drug-disease interactions. Medications for sleep-wake cycle disturbances should be used short term and/or as needed.

#### General considerations for the use of hypnotics

Medications used to induce sleep are intended for the short-term management of sleep disorders. The use of these medications for longer periods is poorly studied. They are usually combined with lifestyle changes that reinforce good sleep habits and negate the need for chronic hypnotic medications.

Most research studies of current and historic hypnotic medications rarely exceed a duration of 12 to 16 weeks. Additionally, no current hypnotic re-creates normal sleep architecture, and variations from normal periods of rapid eye movement (REM) sleep and non-REM sleep are common. It is important to taper hypnotic medications slowly, or the variations in normal sleep patterns can become even more pronounced, with the majority of time spent in REM sleep in a condition known as REM rebound.[30,31]

Table 3 lists the drug categories and specific medications, including doses, commonly used to treat sleep disturbances.

Table 3. Medications Commonly Used to Promote Sleep

Drug Category | Medication | Dose | Comments | Reference
Nonbenzodiazepine benzodiazepine receptor agonist | zaleplon (Sonata) | 5–20 mg | Useful for problems falling asleep only. | [32][Level of evidence: I]
Nonbenzodiazepine benzodiazepine receptor agonist | zolpidem tartrate (Ambien) | 5–10 mg | Useful for problems falling asleep only. Maximum suggested dose for women: 5 mg. | [32][Level of evidence: I]
Nonbenzodiazepine benzodiazepine receptor agonist | zolpidem tartrate extended-release (Ambien CR) | 6.25–12.5 mg | Biphasic release; useful for problems both falling asleep and staying asleep. Do not crush or split tablets. Maximum suggested dose for women: 6.25 mg. | [32][Level of evidence: I]
Nonbenzodiazepine benzodiazepine receptor agonist | eszopiclone (Lunesta) | 1–3 mg | Useful for problems both falling asleep and staying asleep. Do not take with or right after meal. | [32][Level of evidence: I]
Benzodiazepine | clonazepam (Klonopin) | 0.25–2 mg | Used for REM sleep disorder (not FDA approved). | [32][Level of evidence: III];[33]
Benzodiazepine | lorazepam (Ativan) | 0.5–4 mg; dose >2 mg rare | Risk of loss of motor coordination, falls, and cognitive impairment. | [32][Level of evidence: I]
Benzodiazepine | temazepam (Restoril) | 7.5–30 mg | Risk of loss of motor coordination, falls, and cognitive impairment. | [32][Level of evidence: II]
Melatonin receptor agonist | ramelteon (Rozerem) | 8 mg | Useful for problems falling asleep only. Little negative effect on cognition, somnolence, motor coordination, or nausea. | [32][Level of evidence: I]
Antihistamine | diphenhydramine (Benadryl) | 25–100 mg | Useful for problems falling asleep only. Anticholinergic side effects; increases delirium risk in older patients. | [32][Level of evidence: I]
Antihistamine | hydroxyzine (Vistaril, Atarax) | 10–100 mg | Useful for problems falling asleep only. Anticholinergic side effects; increases delirium risk in older patients. | [34][Level of evidence: II]
Tricyclic antidepressant | doxepin (Silenor) | 3–6 mg | Lower doses used for treatment of primary insomnia when antidepressant effect not needed. Risk of anticholinergic side effects and weight gain. | [32][Level of evidence: I]
Tricyclic antidepressant | amitriptyline (Elavil) | 10–25 mg | Lower doses used for treatment of primary insomnia when antidepressant effect not needed. Risk of anticholinergic side effects and weight gain. | [35][Level of evidence: II]
Tricyclic antidepressant | nortriptyline (Pamelor) | 10–50 mg | Risk of anticholinergic side effects and weight gain. | [36][Level of evidence: III]
Second-generation antidepressant | trazodone (Desyrel) | 25–100 mg | Risk of orthostatic hypotension and falls. | [37]
Second-generation antidepressant | mirtazapine (Remeron) | 7.5–45 mg | If depression not a concern, 7.5–15 mg best for sleep, hot flashes, increased appetite, and less morning sedation. Risk of falls. | [35][Level of evidence: III]
Antipsychotic | quetiapine (Seroquel) | 25–100 mg | Risk of weight gain, metabolic syndrome, abnormal/involuntary movements; possible cardiovascular effects (e.g., prolonged QT interval). Generally not a preferred agent due to side effects. | [38][Level of evidence: III]
Chloral derivative | chloral hydrate | 500–1,000 mg | Used mainly for sleep maintenance. Risk of gastric irritation, dependence, and withdrawal. Lethal in overdose. | [32][Level of evidence: I]

CR = controlled-release; FDA = U.S. Food and Drug Administration; REM = rapid eye movement.

#### Nonbenzodiazepine benzodiazepine receptor agonists

All agents in this class are FDA approved for primary insomnia. These agents promote sleep by enhancing the effects of gamma-aminobutyric acid (GABA) at the GABA type A (GABAA) receptor. Unlike traditional benzodiazepines, these agents preferentially target specific GABAA receptor subtypes. Zolpidem and zaleplon bind predominantly to the alpha-1 subtype of GABAA, and eszopiclone preferentially targets the alpha-3 receptor subtype. This selective receptor subtype targeting has both advantages and disadvantages. These agents have mainly hypnotic/sedative effects and lack the anxiolytic, anticonvulsant, and myorelaxant effects seen with benzodiazepines. Conversely, because of the selective receptor subtype targeting, these agents have fewer effects on cognitive and psychomotor function and carry less risk of tolerance, dependence, and withdrawal (especially physical withdrawal) than benzodiazepines.[4,28,29]

These agents may be preferred for use in patients with cancer when only hypnotic effects are desired and should be taken just before bedtime (or even in bed) because they enter the brain very quickly. Some of these agents (e.g., zaleplon) have a short elimination half-life. Because of their longer-lasting effects, zolpidem extended-release and eszopiclone are preferred in the treatment of difficulty staying asleep. However, these agents carry a higher risk of residual morning sedation and cognitive/motor impairments than do agents with shorter elimination half-lives (e.g., zaleplon and immediate-release zolpidem).

#### Benzodiazepines

Benzodiazepines target several GABAA receptor subtypes, including alpha-1, -2, -3, and -5, and work by enhancing GABA effects at these receptors. In addition to hypnotic/sedative effects, these agents also have anxiolytic, anticonvulsant, and myorelaxant effects. Benzodiazepines are preferred when other effects (such as antianxiety or muscle relaxation) are desirable with or without the hypnotic effects.[4,28,29]

Benzodiazepines carry a much higher risk of tolerance, dependence, and withdrawal than nonbenzodiazepine receptor agonists. Benzodiazepine withdrawal has been associated with the risk of seizures, delirium tremens, autonomic instability, and death. These agents should be used with extreme caution and close monitoring in patients with histories of significant substance use because of potential tolerance and dependence issues. Benzodiazepines have also been associated with cognitive impairment and difficulties with motor coordination.

Generally, benzodiazepines with longer half-lives (e.g., clonazepam) are associated with a higher risk of residual morning sedation and cognitive/motor impairments. Agents with shorter elimination half-lives (e.g., lorazepam) are generally preferred for short-term anxiolytic effects and difficulties falling asleep and in older patients. Agents with longer half-lives (e.g., clonazepam) are preferred for the treatment of persistent anxiety and difficulties falling and staying asleep. All benzodiazepines are associated with risk of respiratory depression and should be used with caution in patients with preexisting respiratory disorders.

#### Melatonin receptor agonists: Ramelteon and tasimelteon

Ramelteon and tasimelteon work by binding to the melatonin receptor types MT1 and MT2. Ramelteon is useful only for the treatment of difficulties falling asleep and does not have any other effects, such as anxiolytic or myorelaxant effects. Tasimelteon is indicated for use in circadian sleep disorder. These agents do not treat difficulties staying asleep but also carry much less risk of cognitive/motor impairments and dependence.[28,29,39]

#### Antihistamines

Diphenhydramine and hydroxyzine decrease arousal by blockading histamine receptors. Antihistamines are sold over the counter and are useful for treating difficulties in falling asleep only. There is limited evidence for the use of antihistamines to treat insomnia; these agents are used when traditional hypnotics or benzodiazepines are less suitable because of the risk of cross-dependence or other issues, such as vulnerability of a patient to addictions. The anticholinergic properties of antihistamines may also be beneficial in the treatment of nausea and vomiting. The sedative and anticholinergic properties of these agents increase the risk of delirium, especially in older patients.[28,29]

#### Antidepressants

Sedating antidepressants are considered first-line agents when insomnia is comorbid with depression/anxiety symptomatology. These drugs include tricyclic antidepressants (e.g., amitriptyline) and second-generation antidepressants (e.g., mirtazapine). The sedating effects of tricyclic antidepressants are caused mainly by histamine receptor blockading and partially by blockading of 5-HT2 and muscarinic receptors. The sedating effects of mirtazapine are caused by its blocking of 5-HT2 and histamine receptors, while those of trazodone are caused by its blocking actions at the at histamine, 5-HT, and noradrenaline receptors.[4,28,29] For more information, see the Pharmacological Intervention section in Depression.

Tricyclic antidepressants have a small therapeutic window and can be lethal in overdose, compared with second-generation antidepressants such as mirtazapine. Additionally, tricyclics carry other risks, such as weight gain, anticholinergic side effects, and cardiovascular side effects, and should be used under close supervision. These agents sometimes are used in low doses (see Table 3) as adjuncts to other antidepressants to treat insomnia comorbid with depression/anxiety. This helps to avoid the side effects associated with higher doses while delivering the needed sedating effects. Tricyclics can also boost appetite and may be the treatment of choice for insomnia in patients with comorbid cachexia. Certain tricyclics (amitriptyline and nortriptyline) can also be beneficial in the treatment of pain syndromes (e.g., neuropathic pain) and headaches when these issues are comorbid with insomnia. Low doses of antidepressants (subtherapeutic for depression) are frequently used to treat insomnia without any comorbidities.

Mirtazapine has appetite-stimulating and antiemetic properties in addition to sedating effects. It is frequently used in insomniac patients with depression (therapeutic dose for depression, 15–45 mg) or without depression (subtherapeutic dose for depression, 7.5–15 mg) with comorbid nausea or loss of appetite. In low doses, trazodone (50–100 mg) can promote sleep and is often combined with other antidepressants (e.g., fluoxetine 20 mg in the morning) in depressed patients with insomnia.

#### Antipsychotics

Antipsychotics such as quetiapine have sedating effects caused mainly by the blockade of histamine receptors. However, these agents should be considered as a last resort and as a short-term treatment because of their serious side-effect profile. The use of antipsychotics has been associated with the following:

- Weight gain.
- Metabolic syndrome.
- Diabetes.
- Cardiovascular risks.
- The risk of extrapyramidal side effects, including tardive dyskinesia.

Antipsychotics can be considered for treatment-refractory insomnia, especially with comorbid anxiety symptomatology.[28]

#### Chloral derivative: Chloral hydrate

Chloral hydrate has sleep-promoting effects resulting from its effects on GABA systems. It is associated with risk of withdrawal symptoms similar to those of benzodiazepines and with rapid development of tolerance. Additionally, chloral hydrate carries the risk of gastric irritation and multiple drug interactions, and it is lethal in overdose. Like antipsychotics, chloral hydrate is usually considered only in cases of treatment-refractory insomnia because of its serious side-effect profile and the availability of safer alternatives.[28]

#### Botanical/dietary supplements

##### Melatonin

Melatonin, a hormone produced by the pineal gland during the hours of darkness, plays a major role in the sleep-wake cycle and has been linked to the circadian rhythm. A review found that short-term use of melatonin appears to be safe; however, the studies were not conducted in the context of cancer therapy.[40] Adjuvant melatonin may also improve sleep disruption caused by drugs known to alter normal melatonin production (e.g., beta-blockers and benzodiazepines).[41][Level of evidence: IV] However, a meta-analysis of 25 studies exploring the efficacy and safety of melatonin in managing secondary sleep disorders or sleep disorders accompanying sleep restriction found that melatonin was not effective in these conditions.[42]

Evidence suggests that circulating melatonin levels are significantly lower in physically healthy older people and in insomniacs than in age-matched control subjects. In view of these findings, melatonin replacement therapy may be beneficial in the initiation and maintenance of sleep in older patients.[43][Level of evidence: II] A slow-release formulation of melatonin is licensed in Europe and is approved as monotherapy for patients aged 55 years or older for the short-term treatment (up to 13 weeks) of primary insomnia characterized by poor-quality sleep. However, melatonin replacement as a treatment for insomnia has not been studied in older people with cancer. Ramelteon and tasimelteon work via the melatonin receptor system: ramelteon to support the initiation of sleep, and tasimelteon to correct circadian sleep disorder.

Melatonin may interact with certain chemotherapeutic regimens via the cytochrome P450 enzyme and other systems.[44] It may augment the effects of some chemotherapeutic agents metabolized via the enzyme CYP1A2 and may exert inhibitory effects on P-glycoprotein–mediated doxorubicin efflux.

Clinical studies in individuals with renal, breast, colon, lung, and brain cancer suggest that melatonin exerts anticancer effects in conjunction with chemotherapy and radiation therapy; however, evidence remains inconclusive.[45,46] All of the studies suggesting antitumor effects of melatonin have been conducted by the same group of investigators and were open label. Efforts by independent groups of investigators are under way to investigate these effects in carefully designed, randomized, blinded studies.[45] In vitro and animal studies have demonstrated the anticancer effects of exogenous melatonin, and lower melatonin levels are associated with tumor growth.[47] Human studies have yet to substantiate any causal or associative relationships.

##### Cannabis and cannabinoids

No studies have been conducted to specifically evaluate the effects of Cannabis inhalation or other Cannabis products in patients with primary or secondary sleep disturbances. Limited data from in vitro studies, animal studies, and small populations of healthy individuals or chronic Cannabis users are beginning to elucidate some of the relationships among various neurotransmitters, the sleep-wake cycle, and related effects of Cannabis pharmacology.[48,49]

Cannabis-based medicines are under development as a treatment for chronic pain syndromes, including cancer-related pain. One such medication is nabiximols (Sativex), an oromucosal formulation (delta-9-tetrahydrocannabinol and cannabidiol mixed in a 1:1 ratio). Studies conducted with nabiximols, primarily focusing on pain syndromes, have shown improvement in subjective sleep quality when sleep was measured as a secondary outcome.[50] Comorbidities such as pain are common reasons for sleep disturbances. Concerns have been raised about the abuse and dependence potential of nabiximols, especially in the subpopulation of patients with histories of Cannabis use.[51] Nabiximols is approved in Canada for the treatment of central neuropathic pain in patients with multiple sclerosis. In the United States, it is only available for investigational use and is currently under investigation for the treatment of intractable cancer pain. For more information, see Cannabis and Cannabinoids.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Jefferson CD, Drake CL, Scofield HM, et al.: Sleep hygiene practices in a population-based sample of insomniacs. Sleep 28 (5): 611-5, 2005.16171275
Savard J, Morin CM: Insomnia in the context of cancer: a review of a neglected problem. J Clin Oncol 19 (3): 895-908, 2001.11157043 21104141
Morin CM, Bootzin RR, Buysse DJ, et al.: Psychological and behavioral treatment of insomnia:update of the recent evidence (1998-2004). Sleep 29 (11): 1398-414, 2006.17162986
Becker PM: Pharmacologic and nonpharmacologic treatments of insomnia. Neurol Clin 23 (4): 1149-63, 2005.16243620
Jacobs GD, Benson H, Friedman R: Home-based central nervous system assessment of a multifactor behavioral intervention for chronic sleep-onset insomnia. Behav Ther 24 (1): 159-74, 1993.
Morin CM, Culbert JP, Schwartz SM: Nonpharmacological interventions for insomnia: a meta-analysis of treatment efficacy. Am J Psychiatry 151 (8): 1172-80, 1994.8037252
Smith MT, Perlis ML, Park A, et al.: Comparative meta-analysis of pharmacotherapy and behavior therapy for persistent insomnia. Am J Psychiatry 159 (1): 5-11, 2002.11772681
Morgenthaler T, Kramer M, Alessi C, et al.: Practice parameters for the psychological and behavioral treatment of insomnia: an update. An american academy of sleep medicine report. Sleep 29 (11): 1415-9, 2006.17162987
Edinger JD, Wohlgemuth WK, Radtke RA, et al.: Cognitive behavioral therapy for treatment of chronic primary insomnia: a randomized controlled trial. JAMA 285 (14): 1856-64, 2001.11308399
Berger AM, VonEssen S, Kuhn BR, et al.: Adherence, sleep, and fatigue outcomes after adjuvant breast cancer chemotherapy: results of a feasibility intervention study. Oncol Nurs Forum 30 (3): 513-22, 2003 May-Jun.12719750
Berger AM, VonEssen S, Khun BR, et al.: Feasibilty of a sleep intervention during adjuvant breast cancer chemotherapy. Oncol Nurs Forum 29 (10): 1431-41, 2002 Nov-Dec.12432414
Jacobs GD, Pace-Schott EF, Stickgold R, et al.: Cognitive behavior therapy and pharmacotherapy for insomnia: a randomized controlled trial and direct comparison. Arch Intern Med 164 (17): 1888-96, 2004.15451764
Morin CM, Colecchi C, Stone J, et al.: Behavioral and pharmacological therapies for late-life insomnia: a randomized controlled trial. JAMA 281 (11): 991-9, 1999.10086433
Savard J, Simard S, Ivers H, et al.: Randomized study on the efficacy of cognitive-behavioral therapy for insomnia secondary to breast cancer, part I: Sleep and psychological effects. J Clin Oncol 23 (25): 6083-96, 2005.16135475
Epstein DR, Dirksen SR: Randomized trial of a cognitive-behavioral intervention for insomnia in breast cancer survivors. Oncol Nurs Forum 34 (5): E51-9, 2007.17878117
Espie CA, Fleming L, Cassidy J, et al.: Randomized controlled clinical effectiveness trial of cognitive behavior therapy compared with treatment as usual for persistent insomnia in patients with cancer. J Clin Oncol 26 (28): 4651-8, 2008.18591549
Berger AM, Kuhn BR, Farr LA, et al.: One-year outcomes of a behavioral therapy intervention trial on sleep quality and cancer-related fatigue. J Clin Oncol 27 (35): 6033-40, 2009.19884558
Berger AM, Kuhn BR, Farr LA, et al.: Behavioral therapy intervention trial to improve sleep quality and cancer-related fatigue. Psychooncology 18 (6): 634-46, 2009.19090531
Savard J, Ivers H, Savard MH, et al.: Is a video-based cognitive behavioral therapy for insomnia as efficacious as a professionally administered treatment in breast cancer? Results of a randomized controlled trial. Sleep 37 (8): 1305-14, 2014.25083010
Mustian KM, Sprod LK, Janelsins M, et al.: Multicenter, randomized controlled trial of yoga for sleep quality among cancer survivors. J Clin Oncol 31 (26): 3233-41, 2013.23940231
Chen HM, Tsai CM, Wu YC, et al.: Effect of walking on circadian rhythms and sleep quality of patients with lung cancer: a randomised controlled trial. Br J Cancer 115 (11): 1304-1312, 2016.27811855
Page M: Sleep pattern disturbance. In: McNally JC, Stair JC, Somerville ET, eds.: Guidelines for Cancer Nursing Practice. Grune and Stratton, Inc., 1985, pp 89-95.
Kaempfer SH: Insomnia. In: Baird SB, ed.: Decision Making in Oncology Nursing. B.C. Decker, Inc., 1988, pp 78-9.
Berlin RM: Management of insomnia in hospitalized patients. Ann Intern Med 100 (3): 398-404, 1984.6141753 84126334
Horowitz SA, Breitbart W: Relaxation and imagery for symptom control in cancer patients. In: Breitbart W, Holland JC, eds.: Psychiatric Aspects of Symptom Management in Cancer Patients. American Psychiatric Press, 1993, pp 147-71.
Jim HS, Small B, Faul LA, et al.: Fatigue, depression, sleep, and activity during chemotherapy: daily and intraday variation and relationships among symptom changes. Ann Behav Med 42 (3): 321-33, 2011.21785899
Savard MH, Savard J, Trudel-Fitzgerald C, et al.: Changes in self-reported hot flashes and their association with concurrent changes in insomnia symptoms among women with breast cancer. Menopause 18 (9): 985-93, 2011.21552166
Wilson SJ, Nutt DJ, Alford C, et al.: British Association for Psychopharmacology consensus statement on evidence-based treatment of insomnia, parasomnias and circadian rhythm disorders. J Psychopharmacol 24 (11): 1577-601, 2010.20813762
Sullivan SS: Insomnia pharmacology. Med Clin North Am 94 (3): 563-80, 2010.20451033
Ramakrishnan K, Scheid DC: Treatment options for insomnia. Am Fam Physician 76 (4): 517-26, 2007.17853625
Schutte-Rodin S, Broch L, Buysse D, et al.: Clinical guideline for the evaluation and management of chronic insomnia in adults. J Clin Sleep Med 4 (5): 487-504, 2008.18853708
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
Howell M, Avidan AY, Foldvary-Schaefer N, et al.: Management of REM sleep behavior disorder: an American Academy of Sleep Medicine clinical practice guideline. J Clin Sleep Med 19 (4): 759-768, 2023.36515157
Alford C, Rombaut N, Jones J, et al.: Acute effects of hydroxyzine on nocturnal sleep and sleep tendency the following day: a C-EEG study. Hum Psychopharmacol Clin Exp 7 (1): 25-35, 1992.
Wilson S, Nutt D: Management of insomnia: treatments and mechanismsi. Br J Psychiatry 191: 195-7, 2007.17766757
Pagel JF, Parnes BL: Medications for the Treatment of Sleep Disorders: An Overview. Prim Care Companion J Clin Psychiatry 3 (3): 118-125, 2001.15014609
James SP, Mendelson WB: The use of trazodone as a hypnotic: a critical review. J Clin Psychiatry 65 (6): 752-5, 2004.15291651
Chakravorty S, Hanlon AL, Kuna ST, et al.: The effects of quetiapine on sleep in recovering alcohol-dependent subjects: a pilot study. J Clin Psychopharmacol 34 (3): 350-4, 2014.24747978
Johnsa JD, Neville MW: Tasimelteon: a melatonin receptor agonist for non-24-hour sleep-wake disorder. Ann Pharmacother 48 (12): 1636-41, 2014.25204464
Buscemi N, Vandermeer B, Hooton N, et al.: Efficacy and safety of exogenous melatonin for secondary sleep disorders and sleep disorders accompanying sleep restriction: meta-analysis. BMJ 332 (7538): 385-93, 2006.16473858
Dawson D, Encel N: Melatonin and sleep in humans. J Pineal Res 15 (1): 1-12, 1993.8229640 94046392
van Geijlswijk IM, Korzilius HP, Smits MG: The use of exogenous melatonin in delayed sleep phase disorder: a meta-analysis. Sleep 33 (12): 1605-14, 2010.21120122
Haimov I, Lavie P, Laudon M, et al.: Melatonin replacement therapy of elderly insomniacs. Sleep 18 (7): 598-603, 1995.8552931 96098761
Seely D, Stempak D, Baruchel S: A strategy for controlling potential interactions between natural health products and chemotherapy: a review in pediatric oncology. J Pediatr Hematol Oncol 29 (1): 32-47, 2007.17230065
Lissoni P, Barni S, Mandalà M, et al.: Decreased toxicity and increased efficacy of cancer chemotherapy using the pineal hormone melatonin in metastatic solid tumour patients with poor clinical status. Eur J Cancer 35 (12): 1688-92, 1999.10674014
Mills E, Wu P, Seely D, et al.: Melatonin in the treatment of cancer: a systematic review of randomized controlled trials and meta-analysis. J Pineal Res 39 (4): 360-6, 2005.16207291
Mirick DK, Davis S: Melatonin as a biomarker of circadian dysregulation. Cancer Epidemiol Biomarkers Prev 17 (12): 3306-13, 2008.19064543
Schierenbeck T, Riemann D, Berger M, et al.: Effect of illicit recreational drugs upon sleep: cocaine, ecstasy and marijuana. Sleep Med Rev 12 (5): 381-9, 2008.18313952
Murillo-Rodriguez E, Poot-Ake A, Arias-Carrion O, et al.: The emerging role of the endocannabinoid system in the sleep-wake cycle modulation. Cent Nerv Syst Agents Med Chem 11 (3): 189-96, 2011.21919868
Barnes MP: Sativex: clinical efficacy and tolerability in the treatment of symptoms of multiple sclerosis and neuropathic pain. Expert Opin Pharmacother 7 (5): 607-15, 2006.16553576
Robson P: Abuse potential and psychoactive effects of δ-9-tetrahydrocannabinol and cannabidiol oromucosal spray (Sativex), a new cannabinoid medicine. Expert Opin Drug Saf 10 (5): 675-85, 2011.21542664

## Special Considerations

### The Patient With Pain

Since enhanced pain control improves sleep, appropriate analgesics or nonpharmacological pain management should be administered before introducing sleep medications. Tricyclic antidepressants can be particularly useful for the treatment of insomnia in patients with neuropathic pain and depression. Patients on high-dose opioids for pain may be at increased risk for the development of delirium and organic mental disorders. Such patients may benefit from the use of low-dose neuroleptics as sleep agents (e.g., haloperidol 0.5–1 mg).

### The Older Patient

Older patients frequently have insomnia due to age-related changes in sleep. The sleep cycle in this population is characterized by lighter sleep, more frequent awakenings, and less total sleep time. Anxiety, depression, loss of social support, and a diagnosis of cancer are contributory factors in sleep disturbances in older patients.[1]

Sleep problems in older adults are so common that nearly one-half of all hypnotic prescriptions written are for people older than 65 years. Although normal aging affects sleep, the clinician should evaluate the many factors that cause insomnia, such as:[2]

- Medical illness.
- Psychiatric illness.
- Dementia.
- Alcohol and/or polypharmacy.
- Restless legs syndrome.
- Periodic leg movements.
- Sleep apnea syndrome.

Nonpharmacological treatment of sleep disorders is the preferred initial management, with the use of medication when indicated and referral to a sleep disorder center when specialized care is necessary.[2]

Providing a regular schedule of meals, discouraging daytime naps, and encouraging physical activity may improve sleep. Hypnotic prescriptions for older patients must be adjusted for variations in metabolism, increased fat stores, and increased sensitivity. Dosages should be reduced by 30% to 50%. Problems associated with drug accumulation (especially flurazepam) must be weighed against the risks of more severe withdrawal or rebound effects associated with short-acting benzodiazepines. An alternate drug for older patients is chloral hydrate.[1]

### Sleep Apnea After Mandibulectomy

Anterior mandibulectomy can result in the development of sleep apnea. All patients with head and neck tumors who have had extensive anterior oral cavity resection should be evaluated before decannulation of the tracheostomy tube. Subsequent flap and/or reconstruction of the lower jaw seems to prevent the development of sleep apnea. In contrast, facial sling suspension of the lower lip does not prevent the development of sleep apnea.[3] Assessment for symptoms and preparation for the appearance of symptoms in this population provide indications for interventions related to sleep apnea.

### References

Berlin RM: Management of insomnia in hospitalized patients. Ann Intern Med 100 (3): 398-404, 1984.6141753 84126334
Johnston JE: Sleep problems in the elderly. J Am Acad Nurse Pract 6 (4): 161-6, 1994.8003365 94271638
Panje WR, Holmes DK: Mandibulectomy without reconstruction can cause sleep apnea. Laryngoscope 94 (12 Pt 1): 1591-4, 1984.6503580 85060138

## Latest Updates to This Summary (07/17/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of sleep disorders. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Sleep Disorders are:

- Marilyn J. Hammer, PhD, DC, RN, FAAN (Dana-Farber Cancer Institute)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Sleep Disorders. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/sleep-disorders-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389467]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).